# Sleep Disorders (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of sleep disorders. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General Information About Sleep Disorders

Key Points for This Section
- Getting enough sleep is needed for both physical and mental health.
- Sleep has two main phases that repeat during the sleeping period.
- Sleep disorders affect normal sleep patterns.

### Getting enough sleep is needed for both physical and mental health.

Sleep is an important part of physical and mental health. While we sleep, the brain and body do a number of important jobs that help us stay in good health and function at our best.

Getting the sleep we need:

- Improves our ability to learn, remember, and solve problems.
- Lowers blood pressure and gives the heart and blood vessels the rest they need.
- Helps certain hormones control the following:
  - Growth.
  - The repair of cells and tissues.
  - The immune system (to fight infection).
  - Blood sugar levels (which affect energy).
  - Appetite.

### Sleep has two main phases that repeat during the sleeping period.

There are two main phases of sleep, and both are needed in order to get "a good night's sleep." The two main phases of sleep are rapid eye movement (REM) and non-rapid eye movement (NREM):

- REM sleep, also known as "dream sleep," is the phase of sleep in which the brain is active.
- NREM is the quiet or restful phase of sleep. It has four stages, from light sleep to deep sleep.

The phases of sleep repeat during the night in a cycle of a non-REM phase followed by a REM phase. Each cycle lasts about 90 minutes and is repeated 4 to 6 times during 7 to 8 hours of sleep.

### Sleep disorders affect normal sleep patterns.

Normal sleep patterns differ from person to person. The amount of sleep you need to feel rested may be less or more than others need. If sleep is interrupted or does not last long enough, the phases of sleep are not completed and the brain cannot finish all the tasks that help restore the body and mind. There are five major types of sleep disorders that affect normal sleep.

- Insomnia: Being unable to fall asleep and stay asleep.
- Sleep apnea: A breathing disorder in which breathing stops for 10 seconds or more during sleep.
- Hypersomnia: Being unable to stay awake during the day.
- Circadian rhythm disorders: Problems with the sleep-wake cycle, making you unable to sleep and wake at the right times.
- Parasomnia: Acting in unusual ways while falling asleep, sleeping, or waking from sleep, such as walking, talking, or eating.

Sleep disorders keep you from having a good night's sleep. This may make it hard for you to stay alert and involved in activities during the day. Sleep disorders can cause problems for people with cancer. You may not be able to remember treatment instructions and may have trouble making decisions. Being well-rested can improve energy and help you cope with side effects of cancer and treatment.

Sleep problems that go on for a long time may increase the risk of anxiety or depression.

## Sleep Disorders in People with Cancer

Key Points for This Section
- Sleep disorders are common in people with cancer.
- Tumors may cause sleep problems.
- Certain drugs or treatments may affect sleep.
- Being in the hospital may make it harder to sleep.
- Stress caused by learning the cancer diagnosis often causes sleeping problems.
- Other health problems not related to cancer may cause a sleep disorder.

### Sleep disorders are common in people with cancer.

As many as half of people with cancer have problems sleeping. The sleep disorders most likely to affect people with cancer are insomnia and an abnormal sleep-wake cycle.

There are many reasons you may have trouble sleeping, including:

- Physical changes caused by the cancer or surgery.
- Side effects of drugs or other treatments.
- Being in the hospital.
- Stress about having cancer.
- Health problems not related to the cancer.

### Tumors may cause sleep problems.

If you have a tumor, it may cause the following problems that make it hard to sleep:

- Pressure from the tumor on nearby areas of the body.
- Gastrointestinal problems (nausea, constipation, diarrhea, being unable to control your bowels).
- Bladder problems (irritation, being unable to control urine flow).
- Pain.
- Fever.
- Cough.
- Trouble breathing.
- Itching.
- Feeling very tired.

### Certain drugs or treatments may affect sleep.

Common cancer treatments and drugs can affect normal sleep patterns. How well you sleep may be affected by:

- Hormone therapy.
- Corticosteroids.
- Sedatives and tranquilizers.
- Antidepressants.
- Anticonvulsants.

Long-term use of certain drugs may cause insomnia. Stopping or decreasing the use of certain drugs can also affect normal sleep. Other side effects of drugs and treatments that may affect the sleep-wake cycle include the following:

- Pain. For more information, see Pain.
- Anxiety. For more information, see Adjustment to Cancer: Anxiety and Distress.
- Night sweats or hot flashes. For more information, see Hot Flashes and Night Sweats.
- Gastrointestinal problems such as nausea, constipation, and diarrhea. For more information, see:
  - Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
  - Constipation and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation)
  - Diarrhea and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/diarrhea)
- Bladder problems, such as irritation or being unable to control urine.
- Breathing problems.

### Being in the hospital may make it harder to sleep.

Getting a normal night’s sleep in the hospital is difficult. The following may affect your sleep in a hospital:

- Hospital environment – You may be bothered by an uncomfortable bed, pillow, or room temperature; noise; or sharing a room with a stranger.
- Hospital routine – Sleep may be interrupted when doctors and nurses come in to check on you or give you drugs, other treatments, or exams.

Getting sleep during a hospital stay may also be affected by anxiety and age.

### Stress caused by learning the cancer diagnosis often causes sleeping problems.

Stress, anxiety, and depression are common reactions to learning you have cancer, receiving treatments, and being in the hospital. These are common causes of insomnia. For more information, see Depression.

### Other health problems not related to cancer may cause a sleep disorder.

People with cancer can have sleep disorders that are caused by other health problems. Conditions such as snoring, headaches and daytime seizures increase the chance of having a sleep disorder.

## Assessment of Sleep Disorders

Key Points for This Section
- An assessment is done for people with sleep disorders.
- A sleep disorder assessment includes a physical exam, health history, and sleep history.
- A polysomnogram may be used to help diagnose the sleep disorder.

### An assessment is done for people with sleep disorders.

An assessment is done to find problems that may be causing the sleep disorder and how it affects your life. People with mild sleep disorders may be irritable and unable to concentrate. People with moderate sleep disorders can be depressed and anxious. These sleep disorders may make it hard for you to stay alert and involved in activities during the day. You may not be able to remember treatment instructions and may have trouble making decisions. Being well-rested can improve energy and help you cope with side effects of cancer and treatment.

People with cancer should have assessments done from time to time because sleep disorders may become more or less severe over time.

### A sleep disorder assessment includes a physical exam, health history, and sleep history.

Your doctor will do a physical exam and take a medical history that includes:

- Side effects of your cancer and cancer treatments.
- Medicines, including vitamins, and other over-the-counter drugs.
- Emotional effects of the cancer and treatments.
- Diet.
- Exercise.
- Caregiver routines.

You and your family can tell your doctor about your sleep history and patterns of sleep.

### A polysomnogram may be used to help diagnose the sleep disorder.

A polysomnogram is a group of recordings taken during sleep that show:

- Brain wave changes.
- Eye movements.
- Breathing rate.
- Blood pressure.
- Heart rate and electrical activity of the heart and other muscles.

This information helps the doctor find the cause of your sleeping problems.

## Treatment of Sleep Disorders

Key Points for This Section
- Treating sleep disorders may include supportive care for side effects of cancer or cancer treatment.
- Cognitive behavioral therapy may reduce anxiety and help you relax.
- Learning good sleep habits is important.
- If treatment without drugs does not help, sleep medicines may be used for a short time.

### Treating sleep disorders may include supportive care for side effects of cancer or cancer treatment.

Sleep disorders often occur along with cancer-related fatigue and may be related. Sleep disorders that are caused by side effects of the cancer or cancer treatment may be helped by relieving the symptoms of those side effects. It's important to talk about your sleep problems with your family and the health care team so education and support can be given. Supportive care may improve your quality of life and ability to sleep.

### Cognitive behavioral therapy may reduce anxiety and help you relax.

Cognitive behavioral therapy (CBT) helps reduce anxiety about getting enough sleep. You learn to change negative thoughts and beliefs about sleep into positive thoughts and images, in order to fall asleep more easily. CBT helps replace the anxiety of “I need to sleep” with the idea of “just relax.” You learn how to change sleep habits that keep you from sleeping well. If in-person CBT sessions with a health professional are not available, video CBT sessions have been shown to be helpful. CBT may include the following:

- Stimulus control.
- Sleep restriction.
- Relaxation therapy.

- Stimulus control
  When you have sleep problems for a long time, just getting ready for bed or getting into bed to sleep may cause you to start worrying that you will have another sleepless night. That worry then makes it very hard to fall asleep. Stimulus control can help you learn to connect getting ready for bed and being in bed only with being asleep. By using the bed and bedroom only when you're sleepy, the bed and sleep are linked in your mind. Stimulus control may include the following changes in your sleeping habits:
  - Go to bed only when sleepy and get out of bed if you do not fall asleep after a short time. Return to bed only when you feel sleepy.
  - Use the bed and bedroom only for sleeping, not for other activities.
- Sleep restriction
  Sleep restriction decreases the time you spend in bed sleeping. This makes you more likely to feel sleepy the next night. The time you can set aside for sleeping is increased when your sleep improves.
- Relaxation therapy
  Relaxation therapy is used to relieve muscle tension and stress, lower blood pressure, and control pain. It may involve tensing and relaxing muscles throughout the body. It is often used with guided imagery (focusing the mind on positive images) and meditation (focusing thoughts). Self-hypnosis at bedtime can also help you feel relaxed and sleepy. Relaxation therapy exercises can make it easier for stimulus control and sleep restriction to work for you.

### Learning good sleep habits is important.

Good sleep habits help you fall asleep more easily and stay asleep. Habits and routines that may help improve sleep include the following:

A comfortable bed and bedroom

Making your bed and bedroom more comfortable may help you sleep. Some ways to increase bedroom comfort include:

- Keep the room quiet.
- Dim or turn off lights.
- Keep the room at a comfortable temperature.
- Keep skin clean and dry.
- Dress in loose, soft clothing.
- Keep bedding and pillows clean, dry, and smooth, without wrinkles.
- Use blankets to keep warm.
- Use pillows to get into a comfortable position.

Regular bowel and bladder habits

Regular bowel and bladder habits reduce the number of times you have to get up during the night. Waking during the night to go to the bathroom may be reduced by doing the following:

- Drink more fluids during the day.
- Eat more high-fiber foods during the day.
- Avoid drinking a lot before bedtime.
- Empty your bowel and bladder before going to bed.

Diet and exercise

The following diet and exercise habits may improve sleep:

- Stay active during the day.
- Get regular exercise but don't exercise within 3 hours of bedtime.
- Eat a high-protein snack (such as milk or turkey) 2 hours before bedtime.
- Avoid heavy, spicy, or sugary foods before bedtime.
- Avoid drinking alcohol or smoking before bedtime.
- Avoid foods and drinks that have caffeine, including dietary supplements to control appetite.

Other habits that may improve sleep include:

- Avoid naps.
- Avoid watching TV or working in the bedroom.
- Relax before bedtime.
- Go to sleep and wake up at the same hours every day, no matter how little you slept.

Hospital routines

Getting a good night's sleep in a hospital or other care facility can be hard to do. The good sleep habits listed above may help you. As a hospital patient, you may also:

- Ask caregivers to plan care so they wake you up the least number of times during the night.
- Ask for a back rub or massage to relieve pain or help you relax.

### If treatment without drugs does not help, sleep medicines may be used for a short time.

Treatment without drugs does not always work. Sometimes cognitive behavioral therapies are not available or they do not help. Also, some sleep disorders are caused by conditions that need to be treated with drugs, such as hot flashes, pain, anxiety, depression, or mood disorders. The drug used will depend on your type of sleep problem (such as trouble falling asleep or trouble staying asleep) and other medicines you're taking. All of your other medicines and health conditions will affect which sleeping medicines are safe and will work well for you.

Some drugs that help you sleep should not be stopped suddenly. Suddenly stopping them may cause nervousness, seizures, and a change in the REM phase of sleep that increases dreaming, including nightmares. This change in REM sleep may be dangerous for people with peptic ulcers or heart conditions.

## Sleep Disorders in Special Cases

Key Points for This Section
- People Who Have Pain
- Older Patients
- People Who Have Jaw Surgery

### People Who Have Pain

If pain disturbs your sleep, treatment to relieve the pain will be used before sleep medicines are used. Pain drugs, other drugs being taken, and any other health conditions may affect which sleeping medicines are prescribed.

### Older Patients

It's normal for older people to have some insomnia. Changes related to age can cause lighter sleep, waking up more often during the night, and sleeping less total time. If you are an older person with cancer who is having trouble sleeping, the doctor will look for the specific causes, such as:

- Physical health problems.
- Mental health problems, such as anxiety or depression.
- Loss of social support.
- Alcohol use (drinking).
- Side effects of medicines.
- Conditions that commonly affect sleep, such as restless legs syndrome, cramping or jerking of the legs during sleep, and sleep apnea syndrome.

Treating sleeping problems without drugs is tried first. The following may help improve sleep in older people with cancer:

- Having meals at regular times.
- Avoiding naps during the day.
- Being more active during the day.

Medicine may be used if non-drug treatments don't work. The doctor will look at all your medicines and health conditions before choosing a sleeping medicine. For some people, doctors will suggest a sleep disorder clinic for treatment.

### People Who Have Jaw Surgery

People who have surgery on the jaw may develop sleep apnea, which is a sleep disorder that causes the person to stop breathing for 10 seconds or more during sleep. Plastic surgery to rebuild the jaw may help prevent sleep apnea.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Sleep Disorders

For more information from the National Cancer Institute about sleep problems, see the following:

- Sleep Problems and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/sleep-disorders)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the causes and treatment of sleep disorders. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Sleep Disorders. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/sleep-disorders-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389249]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).